# Cancer-Related Post-Traumatic Stress (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the diagnostic criteria for and treatment of cancer-related post-traumatic stress and related symptoms. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Stress- or trauma-related symptoms such as avoidant behaviors, intrusive thoughts, and heightened arousal are often seen in survivors of cancer.[1-4] These symptoms resemble those seen in individuals who have experienced traumatic events such as:[5]

- Military combat.
- Violent personal assault (e.g., rape).
- Natural disasters.
- Other threats to life.

These symptoms experienced by cancer survivors fall under the “Trauma- and Stressor-Related Disorders” category in the Diagnostic and Statistical Manual of Mental Disorders, fifth edition (DSM-5). The category includes acute stress disorder, adjustment disorders, and post-traumatic stress disorder (PTSD).[5]

Reviews note that post-traumatic stress (PTS) has been studied in a variety of cancers, including melanoma, Hodgkin lymphoma, breast cancer, and mixed cancers.[6]

Most of the studies to date have used the criteria of the DSM, fourth edition (DSM-IV) because they were conducted before publication of the DSM-5. This summary will primarily refer to studies conducted using the DSM-IV criteria.

Studies have varied in the assessment of patients for the full syndrome of PTSD (i.e., all DSM criteria met) or only some of the PTSD-related symptoms (e.g., intrusive thoughts as measured by the Impact of Event Scale). As a result, incidence rates have varied.

Risk factors for patients with cancer developing PTS and PTSD have not been extensively studied. However, one study of women with early-stage breast cancer found an association with PTSD-like symptoms in patients with the following characteristics:[7]

- Younger age.
- Lower income.
- Fewer years of formal education.

Another study of men and women treated with bone marrow transplant found that lower levels of social support and the use of avoidance coping correlated significantly to a higher number of PTSD-like symptoms.[8] One German study that evaluated patients with breast cancer for PTSD and acute stress disorder (ASD) concluded that patients with lifetime PTSD (8.7%) were much more likely to experience cancer-related ASD or PTSD (odds ratio, 14.1).[9]

Although no specific therapies for PTS symptoms in the cancer setting have been developed, treatment modalities used with other people with PTSD can be useful in alleviating distress in cancer patients and survivors.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Kornblith AB, Anderson J, Cella DF, et al.: Quality of life assessment of Hodgkin's disease survivors: a model for cooperative clinical trials. Oncology (Huntingt) 4 (5): 93-101; discussion 104, 1990.1696491 90344531
Alter CL, Pelcovitz D, Axelrod A, et al.: Identification of PTSD in cancer survivors. Psychosomatics 37 (2): 137-43, 1996 Mar-Apr.8742542 96357807
Kornblith AB, Anderson J, Cella DF, et al.: Hodgkin disease survivors at increased risk for problems in psychosocial adaptation. The Cancer and Leukemia Group B. Cancer 70 (8): 2214-24, 1992.1394054 93007763
Koocher G, O'Malley J: The Damocles Syndrome: Psychosocial Consequences of Surviving Childhood Cancer. McGraw-Hill, 1981.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Gurevich M, Devins GM, Rodin GM: Stress response syndromes and cancer: conceptual and assessment issues. Psychosomatics 43 (4): 259-81, 2002 Jul-Aug.12189252
Cordova MJ, Andrykowski MA, Kenady DE, et al.: Frequency and correlates of posttraumatic-stress-disorder-like symptoms after treatment for breast cancer. J Consult Clin Psychol 63 (6): 981-6, 1995.8543720
Jacobsen PB, Sadler IJ, Booth-Jones M, et al.: Predictors of posttraumatic stress disorder symptomatology following bone marrow transplantation for cancer. J Consult Clin Psychol 70 (1): 235-40, 2002.11860050
Mehnert A, Koch U: Prevalence of acute and post-traumatic stress disorder and comorbid mental disorders in breast cancer patients during primary cancer care: a prospective study. Psychooncology 16 (3): 181-8, 2007.16856147

## Prevalence

Reviews of the literature [1] note that post-traumatic stress (PTS) has been studied in a variety of cancers, including melanoma, Hodgkin lymphoma, breast cancer, and mixed cancers.

The incidence of the full syndrome of post-traumatic stress disorder (PTSD) (meeting all Diagnostic and Statistical Manual of Mental Disorders [DSM] diagnostic criteria) ranges from 3% to 4% in patients recently diagnosed with early-stage disease to 35% in patients evaluated after treatment. When the incidence of PTSD-like symptoms (not meeting the full DSM diagnostic criteria) is measured, rates are higher, ranging from 20% in patients with early-stage cancer to 80% in those with recurrent cancer.

The earliest research on PTS among cancer survivors concentrated on the prevalence and characteristics of the disorder in patients who had undergone or were undergoing treatment, adult and child cancer survivors, and/or their family members. A wide variety of cancer types was studied, including leukemia,[2] breast cancer, and head and neck cancers.[3] Much of this early research, which predates DSM-IV, dealt with survivors of Hodgkin disease, probably because diagnoses at an early age and higher rates of survival resulted in a larger population available for study.[4] These survivors had a particularly high prevalence of intrusive thoughts and avoidance behaviors, even though they were many years posttreatment.[5-7] Most of these studies investigated PTSD-like symptoms, rather than the complete mental disorder with all diagnostic criteria.

The first study of cancer patients using the DSM-IV diagnostic criteria looked at 27 patients (most with breast cancer), all at least 3 years postdiagnosis and no longer receiving any cancer treatments. Prevalence rates of 4% for current PTSD and 22% for lifetime prevalence were found.[8] Those who met the criteria for lifetime prevalence were noted to have higher levels of general psychological distress, suggesting that individuals with a history of PTSD are at a substantial risk of continued emotional difficulties.

Studies using the Structured Clinical Interview for DSM (SCID) [9] found prevalence rates for PTSD between 3% and 10% in adult patients with cancer. Most of these studies looked at women with early-stage breast cancer, who were evaluated a few months to a few years after their cancer treatments. Similarly, in a prospective study of 115 patients with all stages of breast cancer being treated at a comprehensive cancer center, 4% met the full diagnostic criteria for PTSD; 41% met the subsyndromal criteria for PTSD (experiencing intense fear, helplessness, or horror after being diagnosed with cancer). This set of subsyndromal criteria was a weak predictor of PTSD (12%) but a useful predictor of major depressive disorder, global anxiety disorder, and past major depressive disorder, and it may better serve as a marker for elevated distress.[10]

In a few studies of patients who underwent bone marrow transplants, slightly higher prevalence rates of PTSD have been reported, ranging from 5% [11] to 12% to 19% [12] to as high as 35%.[13] The range appears to be influenced by time of assessment (higher rates occur with more time since transplant) and the assessment method used. Studies reporting lower rates typically used a self-report questionnaire,[14] whereas those reporting higher rates [13] used the SCID and evaluated for symptoms at multiple time points since diagnosis (i.e., lifetime prevalence). The changes to the fifth edition of the DSM (DSM-5) included removal of the subjective response of “intense fear, horror, or helplessness” that had been added to Criterion A in the DSM-IV.[15]

To illustrate the distinction between these tools, a German study evaluated patients with breast cancer (n = 127) for PTSD immediately postsurgery and 6 months after the first assessment.[16] The assessments included screening instruments for acute stress disorder (ASD) and PTSD, such as the Impact of Event Scale-Revised (IES-R) and the PTSD Checklist-Civilian (PCL-C). The first assessment also included a semistructured interview using the SCID. Based on the SCID, 2.4% of participants met the criteria for mild-to-moderate cancer-related PTSD, and 2.4% were diagnosed with ASD. However, the IES-R and PCL-C screening instruments identified PTSD in 18.5% of participants at the first assessment and in 11.2% to 16.3% of participants at the second assessment. Authors of the study suggested that unlike the SCID, the IES-R and PCL-C screening instruments measured diffuse emotional distress and adjustment problems and not precise PTSD symptoms.

One of the main differences between symptom-based measures such as the PCL-C and an actual SCID-based diagnosis is the dysfunction caused by the symptoms. The symptoms are rather common, but only a small percentage of people who have the symptoms are disabled by them.

### References

Gurevich M, Devins GM, Rodin GM: Stress response syndromes and cancer: conceptual and assessment issues. Psychosomatics 43 (4): 259-81, 2002 Jul-Aug.12189252
Lesko LM, Ostroff JS, Mumma GH, et al.: Long-term psychological adjustment of acute leukemia survivors: impact of bone marrow transplantation versus conventional chemotherapy. Psychosom Med 54 (1): 30-47, 1992 Jan-Feb.1553400 92205004
Manuel GM, Roth S, Keefe FJ, et al.: Coping with cancer. J Human Stress 13 (4): 149-58, 1987 Winter.3448128 88198940
Cella DF, Pratt A, Holland JC: Persistent anticipatory nausea, vomiting, and anxiety in cured Hodgkin's disease patients after completion of chemotherapy. Am J Psychiatry 143 (5): 641-3, 1986.3963254 86184256
Kornblith AB, Anderson J, Cella DF, et al.: Comparison of psychosocial adaptation and sexual function of survivors of advanced Hodgkin disease treated by MOPP, ABVD, or MOPP alternating with ABVD. Cancer 70 (10): 2508-16, 1992.1384949 93046017
Kornblith AB, Anderson J, Cella DF, et al.: Quality of life assessment of Hodgkin's disease survivors: a model for cooperative clinical trials. Oncology (Huntingt) 4 (5): 93-101; discussion 104, 1990.1696491 90344531
Kornblith AB, Anderson J, Cella DF, et al.: Hodgkin disease survivors at increased risk for problems in psychosocial adaptation. The Cancer and Leukemia Group B. Cancer 70 (8): 2214-24, 1992.1394054 93007763
Alter CL, Pelcovitz D, Axelrod A, et al.: Identification of PTSD in cancer survivors. Psychosomatics 37 (2): 137-43, 1996 Mar-Apr.8742542 96357807
Spitzer RL, Williams JB, Gibbon M, et al.: The Structured Clinical Interview for DSM-III-R (SCID). I: History, rationale, and description. Arch Gen Psychiatry 49 (8): 624-9, 1992.1637252 92344509
Palmer SC, Kagee A, Coyne JC, et al.: Experience of trauma, distress, and posttraumatic stress disorder among breast cancer patients. Psychosom Med 66 (2): 258-64, 2004 Mar-Apr.15039512
Widows MR, Jacobsen PB, Fields KK: Relation of psychological vulnerability factors to posttraumatic stress disorder symptomatology in bone marrow transplant recipients. Psychosom Med 62 (6): 873-82, 2000 Nov-Dec.11139008
Jacobsen PB, Widows MR, Hann DM, et al.: Posttraumatic stress disorder symptoms after bone marrow transplantation for breast cancer. Psychosom Med 60 (3): 366-71, 1998 May-Jun.9625227
Mundy EA, Blanchard EB, Cirenza E, et al.: Posttraumatic stress disorder in breast cancer patients following autologous bone marrow transplantation or conventional cancer treatments. Behav Res Ther 38 (10): 1015-27, 2000.11004740
Weathers FW, Litz BT, Keane TM, et al.: The PTSD Checklist for DSM-5 (PCL-5). White River Junction, Vt: National Center for PTSD, 2013. Available online (https://www.ptsd.va.gov/professional/assessment/adult-sr/ptsd-checklist.asp). Last accessed Feb. 25, 2025.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Mehnert A, Koch U: Prevalence of acute and post-traumatic stress disorder and comorbid mental disorders in breast cancer patients during primary cancer care: a prospective study. Psychooncology 16 (3): 181-8, 2007.16856147

## Risk Factors, Protective Factors, and Hypothesized Mechanisms

A variety of sociodemographic, disease-related, psychosocial, and psychological variables have been investigated to determine their relationship to post-traumatic stress (PTS) related to cancer. So far, there is no clear picture of which patients are at increased risk of developing PTS after a diagnosis of or treatment for cancer.

### Sociodemographic Variables

Few patient characteristics have been shown to predict the occurrence of PTS. High levels of psychological distress have been correlated with both stress symptoms [1-3] and a diagnosis of full-syndrome post-traumatic stress disorder (PTSD) in adult survivors.[1] In addition, trait anxiety was found to predict post-traumatic symptoms in the parents of survivors of childhood cancer.[4] Women who are survivors of cancer and have a diagnosis of lifetime PTSD tend to have a history of exposure to trauma.[1,5] Demographic characteristics such as age, sex, and education level at time of diagnosis have not been reliable predictors of stress symptoms.[1,6,7]

### Disease-Related Variables

Disease-related variables that have been associated with a higher incidence of PTSD in patients who underwent bone marrow transplant include more advanced disease and a longer hospital stay.[8] Other studies, however, have found no association between time since diagnosis and treatment, severity of disease, or type of cancer treatment.[1,9,10] The relationship between disease stage and post-traumatic symptoms has not been adequately studied. Most studies have not found an association; however, they typically included a limited range of disease stages or studied only early-stage cancer.[11]

The time since diagnosis and treatment has been shown to correlate with and predict post-traumatic symptoms in survivors of osteogenic sarcoma [2] and Hodgkin lymphoma.[7,12] Specifically, people who were further from diagnosis and treatment tended to exhibit fewer symptoms. This effect, however, has not been found in studies of patients with recent recurrences,[13] survivors of breast cancer,[1] or survivors of childhood cancers.[14] Duration of treatment, rather than time since treatment, has been shown to predict stress symptoms in survivors of childhood cancer.[14]

The presence of pain and other physical symptoms has been shown to correlate with levels of intrusive thoughts.[2] Cancer recurrence has also been shown to increase the likelihood of stress symptoms in patients.[13]

### Psychosocial and Psychological Variables

The experience of past traumatic events appears to be an important psychosocial risk factor associated with PTS symptoms,[5,15,16] as was found in both patients with early-stage [17] and those with metastatic breast cancer.[18] Previous trauma in combination with recent stressful life events was significantly related to PTS symptoms.[19]

Other psychosocial risk factors, such as premorbid psychopathology,[20,21] high levels of general psychological distress,[22] and dysfunctional coping and attributional styles, [15,23,24] have been linked to a risk of PTSD in war veterans, Holocaust survivors, and other disaster victims. In addition, several investigators have linked predisposing genetic factors [25,26] and other biological factors (e.g., overly reactive hormonal systems and reduced hippocampal volume) to risk of PTSD.[27-29] Among social factors, the quality of the recovery environment, often measured in terms of social support, has been shown to affect risk of PTSD after exposure to combat [20] and burn injury.[30] The effect of threats to life and body integrity has been documented in samples of adults and families [1,4,12] but not children.[14]

Psychological variables that have been related to a higher incidence of PTSD include:

- A history (precancer diagnosis) of PTSD.[5,31]
- Increased use of avoidance coping.[32]
- Lower levels of social support.[32]

### Protective Factors

Greater perceived availability of social support is associated with fewer stress-response symptoms in patients with early-stage breast cancer [17,19] and in patients who have undergone bone marrow transplant.[32]

The availability and timeliness of accurate health-related information may also offer protection from stress-response symptoms. Women who met the diagnostic criteria for acute stress disorder reported significantly less satisfaction with the communication of their cancer diagnosis.[33] Similarly, women who were unaware of their cancer stage reported higher stress-response symptoms than those who knew more about the stage of their disease.[34] To the extent that adequacy of information reflects the quality of a patient’s relationship with medical staff, another protective factor may be the quality of those relationships. Difficult patient-staff relationships have been reported to predict stress-response symptoms in women with cancer.[35]

### Hypothesized Mechanisms

PTSD is precipitated by an intensely distressing event; however, this factor alone is not sufficient to explain the disorder. Not everyone exposed to a traumatic stressor develops the full-blown syndrome (or subsets of symptoms) or qualifies for the diagnosis. Attempts to explain these differences and to predict who is vulnerable have focused on the following types of factors:

- Psychological (i.e., learning theory).
- Biological (especially hormonal).
- Social (i.e., social support).

Early studies of Vietnam War veterans suggested a two-factor learning theory to account for trauma-related pathology.[36,37] The same theory has also been applied to the development of PTSD in patients with cancer.[38-40]

PTSD symptoms develop as a function of both classical conditioning and instrumental learning. Classical conditioning accounts for the fear responses elicited by various stimuli that are associated with the original traumatic event. Neutral stimuli (e.g., smells, sounds, and visual images) previously paired with the aversive stimuli (e.g., chemotherapy or painful procedures) eventually evoke anxiety, arousal, and fear when presented alone, even after the trauma has ended. Higher-order conditioning and stimulus generalization account for the exacerbation and extension of symptoms to additional stimuli. Once established, PTSD symptoms are maintained through instrumental learning, that is, avoidant responses are reinforced because avoidance of the stimuli prevents unpleasant feelings and thoughts.

Estimates from epidemiological studies suggest that on average, 25% to 33% of individuals who are exposed to traumatic events, including cancer, develop PTSD or subsyndromal PTSD.[27,41] Although the disorder appears to be a result of learning processes, many factors have been suggested to explain why one person develops PTSD and another does not.

### References

Alter CL, Pelcovitz D, Axelrod A, et al.: Identification of PTSD in cancer survivors. Psychosomatics 37 (2): 137-43, 1996 Mar-Apr.8742542 96357807
Kornblith AB, Herr HW, Ofman US, et al.: Quality of life of patients with prostate cancer and their spouses. The value of a data base in clinical care. Cancer 73 (11): 2791-802, 1994.8194021 94251720
Kornblith AB, Anderson J, Cella DF, et al.: Quality of life assessment of Hodgkin's disease survivors: a model for cooperative clinical trials. Oncology (Huntingt) 4 (5): 93-101; discussion 104, 1990.1696491 90344531
Stuber ML, Gonzalez S, Meeske K, et al.: Post-traumatic stress after childhood cancer II: a family model. Psychooncology 3 (4): 313-19, 1994.
Shelby RA, Golden-Kreutz DM, Andersen BL: PTSD diagnoses, subsyndromal symptoms, and comorbidities contribute to impairments for breast cancer survivors. J Trauma Stress 21 (2): 165-72, 2008.18404636
Kornblith AB, Anderson J, Cella DF, et al.: Comparison of psychosocial adaptation and sexual function of survivors of advanced Hodgkin disease treated by MOPP, ABVD, or MOPP alternating with ABVD. Cancer 70 (10): 2508-16, 1992.1384949 93046017
Kornblith AB, Anderson J, Cella DF, et al.: Hodgkin disease survivors at increased risk for problems in psychosocial adaptation. The Cancer and Leukemia Group B. Cancer 70 (8): 2214-24, 1992.1394054 93007763
Jacobsen PB, Widows MR, Hann DM, et al.: Posttraumatic stress disorder symptoms after bone marrow transplantation for breast cancer. Psychosom Med 60 (3): 366-71, 1998 May-Jun.9625227
Cordova MJ, Andrykowski MA, Kenady DE, et al.: Frequency and correlates of posttraumatic-stress-disorder-like symptoms after treatment for breast cancer. J Consult Clin Psychol 63 (6): 981-6, 1995.8543720
Green BL, Rowland JH, Krupnick JL, et al.: Prevalence of posttraumatic stress disorder in women with breast cancer. Psychosomatics 39 (2): 102-11, 1998.9584535
Gurevich M, Devins GM, Rodin GM: Stress response syndromes and cancer: conceptual and assessment issues. Psychosomatics 43 (4): 259-81, 2002 Jul-Aug.12189252
Cella DF, Tross S: Psychological adjustment to survival from Hodgkin's disease. J Consult Clin Psychol 54 (5): 616-22, 1986.3771879 87034509
Cella DF, Mahon SM, Donovan MI: Cancer recurrence as a traumatic event. Behav Med 16 (1): 15-22, 1990 Spring.2322653 90212842
Stuber ML, Meeske K, Gonzalez S, et al.: Post-traumatic stress after childhood cancer I: the role of appraisal. Psychooncology 3 (4): 305-12, 1994.
Davidson JR, Foa EB: Diagnostic issues in posttraumatic stress disorder: considerations for the DSM-IV. J Abnorm Psychol 100 (3): 346-55, 1991.1918613 92012538
Baider L, Sarell M: Coping with cancer among holocaust survivors in Israel: an exploratory study. J Human Stress 10 (3): 121-7, 1984 Fall.6520392 85106189
Andrykowski MA, Cordova MJ: Factors associated with PTSD symptoms following treatment for breast cancer: test of the Andersen model. J Trauma Stress 11 (2): 189-203, 1998.9565911
Butler LD, Koopman C, Classen C, et al.: Traumatic stress, life events, and emotional support in women with metastatic breast cancer: cancer-related traumatic stress symptoms associated with past and current stressors. Health Psychol 18 (6): 555-60, 1999.10619528
Green BL, Krupnick JL, Rowland JH, et al.: Trauma history as a predictor of psychologic symptoms in women with breast cancer. J Clin Oncol 18 (5): 1084-93, 2000.10694561 20160755
Green BL, Grace MC, Lindy JD, et al.: Risk factors for PTSD and other diagnoses in a general sample of Vietnam veterans. Am J Psychiatry 147 (6): 729-33, 1990.2343915 90261770
Smith EM, North CS, McCool RE, et al.: Acute postdisaster psychiatric disorders: identification of persons at risk. Am J Psychiatry 147 (2): 202-6, 1990.2301660 90145249
Jacobsen PB, Sadler IJ, Booth-Jones M, et al.: Predictors of posttraumatic stress disorder symptomatology following bone marrow transplantation for cancer. J Consult Clin Psychol 70 (1): 235-40, 2002.11860050
Green BL, Lindy JD, Grace MC: Posttraumatic stress disorder. Toward DSM-IV. J Nerv Ment Dis 173 (7): 406-11, 1985.4009157 85236284
Mikulincer M, Solomon Z: Attributional style and combat-related posttraumatic stress disorder. J Abnorm Psychol 97 (3): 308-13, 1988.3192823 89054601
Johnson AM, Teoh D, Jewett P, et al.: Genetic variants associated with post-traumatic stress symptoms in patients with gynecologic cancer. Gynecol Oncol 170: 102-107, 2023.36681010
True WR, Rice J, Eisen SA, et al.: A twin study of genetic and environmental contributions to liability for posttraumatic stress symptoms. Arch Gen Psychiatry 50 (4): 257-64, 1993.8466386 93221351
Yehuda R, Resnick H, Kahana B, et al.: Long-lasting hormonal alterations to extreme stress in humans: normative or maladaptive? Psychosom Med 55 (3): 287-97, 1993 May-Jun.8346336 93348364
Yehuda R, Boisoneau D, Lowy MT, et al.: Dose-response changes in plasma cortisol and lymphocyte glucocorticoid receptors following dexamethasone administration in combat veterans with and without posttraumatic stress disorder. Arch Gen Psychiatry 52 (7): 583-93, 1995.7598635 95321862
Bremner JD, Randall P, Scott TM, et al.: MRI-based measurement of hippocampal volume in patients with combat-related posttraumatic stress disorder. Am J Psychiatry 152 (7): 973-81, 1995.7793467 95313772
Perry S, Difede J, Musngi G, et al.: Predictors of posttraumatic stress disorder after burn injury. Am J Psychiatry 149 (7): 931-5, 1992.1609874 92303676
Mundy EA, Blanchard EB, Cirenza E, et al.: Posttraumatic stress disorder in breast cancer patients following autologous bone marrow transplantation or conventional cancer treatments. Behav Res Ther 38 (10): 1015-27, 2000.11004740
Widows MR, Jacobsen PB, Fields KK: Relation of psychological vulnerability factors to posttraumatic stress disorder symptomatology in bone marrow transplant recipients. Psychosom Med 62 (6): 873-82, 2000 Nov-Dec.11139008
McGarvey EL, Canterbury RJ, Koopman C, et al.: Acute stress disorder following diagnosis of cancer. International Journal of Rehabilitation and Health 4 (1): 1-15, 1998.
Naidich JB, Motta RW: PTSD-related symptoms in women with breast cancer. Journal of Psychotherapy in Independent Practice 1 (1): 35-54, 2000.
Carlier IV, Gersons BP: Partial posttraumatic stress disorder (PTSD): the issue of psychological scars and the occurrence of PTSD symptoms. J Nerv Ment Dis 183 (2): 107-9, 1995.7844572
Keane TM, Zimering RT, Caddell JM, et al.: A behavioral formulation of posttraumatic stress disorder in Vietnam veterans. Behavior Therapist 8(1): 9-12, 1985.
Charney DS, Deutch AY, Krystal JH, et al.: Psychobiologic mechanisms of posttraumatic stress disorder. Arch Gen Psychiatry 50 (4): 294-305, 1993.
Cella DF, Pratt A, Holland JC: Persistent anticipatory nausea, vomiting, and anxiety in cured Hodgkin's disease patients after completion of chemotherapy. Am J Psychiatry 143 (5): 641-3, 1986.3963254 86184256
Redd WH, Dadds MR, Futterman AD, et al.: Nausea induced by mental images of chemotherapy. Cancer 72 (2): 629-36, 1993.8319197 93306617
Jacobsen PB, Bovbjerg DH, Redd WH: Anticipatory anxiety in women receiving chemotherapy for breast cancer. Health Psychol 12 (6): 469-75, 1993.8293730 94123663
Greenberg DB, Goorin A, Gebhardt MC, et al.: Quality of life in osteosarcoma survivors. Oncology (Huntingt) 8 (11): 19-25; discussion 25-6, 32, 35, 1994.7826837 95127439

## Assessment of Post-Traumatic Stress and Post-Traumatic Stress Disorder in the Cancer Setting

### Diagnostic Criteria for Post-Traumatic Stress Disorder (PTSD) and Acute Stress Disorder (ASD)

The diagnostic criteria for PTSD and ASD changed considerably in the fifth edition of the American Psychiatric Association’s Diagnostic and Statistical Manual of Mental Disorders (DSM-5). Changes from the fourth edition to the DSM-5 included the following:[1]

- Elimination of the subjective component to the definition of trauma.
- Tightening of the definitions of trauma and exposure to it.
- Expansion and rearrangement of symptom criteria.
- Changes in additional criteria and specifiers.

Criterion A, which is necessary for PTSD and ASD diagnoses, specifically states, “A life-threatening illness or debilitating medical condition is not necessarily considered a traumatic event. Medical incidents that qualify as traumatic events involve sudden, catastrophic events.” Thus, for the experience of cancer to meet Criterion A, it must entail acute and extreme adverse events in the context of cancer and/or cancer treatments. Events such as the cancer diagnosis, side effects of cancer treatments, and distress, worries, or negative thoughts about prognosis do not automatically qualify as trauma. Furthermore, patients with cancer can only be diagnosed with ASD or PTSD if they experience specific trauma-related symptoms, many of which are focused on or related to re-experiencing symptoms and intrusive memories. Fear of recurrence or worries about prognosis do not qualify as PTSD or ASD symptoms.

The four core clusters of symptoms for a PTSD diagnosis are as follows:

- Re-experiencing of trauma symptoms, e.g., nightmares, flashbacks, and intrusive memories (at least one out of five).
- Avoidance symptoms, e.g., avoidance of distressing cancer memories (at least one out of two).
- Numbing/dissociative and/or negative cognitive symptoms, e.g., unrealistic guilt or self-blame (at least two out of seven).
- Arousal and reactivity symptoms, e.g., reckless/destructive behaviors and unprovoked angry outbursts (at least two out of six).

These symptoms must last for at least 1 month and cause clinically significant distress or impairment in social, occupational, or other important areas of functioning.

### Post-Traumatic Stress (PTS) and PTSD in the Cancer Setting

A timely, careful assessment of patients with cancer is critical to identify symptoms of cancer-related PTS, to note the deleterious impact of the symptoms on functioning, and to plan interventions targeted at the most distressing symptoms. It is also critical that the assessment distinguish between the full DSM PTSD syndrome (meets all required diagnostic criteria) and PTS-related symptoms only.

The most difficult aspect of PTS assessment in the cancer setting is the determination of precisely when to evaluate the patient. Diagnosis is complicated because cancer is not an acute or discrete event, but an experience marked by repeated trauma and indeterminate length. An individual may exhibit the symptoms of PTS at any point from diagnosis through treatment, to treatment completion and, possibly, to recurrence.[2] Patients such as Holocaust survivors, whose history of victimization can cause PTSD or its symptoms, can have symptoms activated by any number of stimuli encountered during their treatment (e.g., clinical procedures such as being inside magnetic resonance imaging or computed tomography scanners). While such patients may have more difficulty adjusting to cancer and cancer treatment, their symptomatology is likely to vary greatly according to their circumstances. The relative predominance of specific PTS symptoms may wax and wane throughout the cancer experience and beyond.[3]

The definition in the DSM-5 indicates that although PTSD symptoms usually begin within 3 months after trauma, there may be a delay of 4 or more months or even years before symptoms appear.[1] These findings support the necessity for long-term monitoring of cancer survivors and their family members.

At least one study found that individuals who have experienced a traumatic event may exhibit early symptoms without meeting the full criteria for a diagnosis of PTSD.[4] Nonetheless, the appearance of these early symptoms was found to predict later development of full PTSD syndrome. These results lend further credence to the need for both repeated and long-term follow-up of individuals exposed to the trauma of cancer. For more information, see Adjustment to Cancer: Anxiety and Distress.

The difficulty of properly diagnosing PTS may be compounded by the overlapping of PTS symptoms with those of other psychiatric disorders and by the time-related aspects of normal adjustment. For example, irritability, poor concentration, hypervigilance, excessive fear, and disturbed sleep are also symptoms of generalized anxiety disorder. Other arousal and avoidance symptoms are common to PTSD, phobias, and panic disorder, but loss of interest, sense of a foreshortened future, avoidance of other people, and sleep impairment might suggest both PTSD and depressive disorders. Even normal reactions to the diagnosis and treatment of life-threatening disease can consist of responses such as:

- Intrusive thoughts.
- Disassociation and depersonalization.
- Sleep disturbances.
- Heightened arousal.

Clinicians and researchers must be particularly attuned to the causes, duration, and severity of PTSD-like symptoms when considering PTSD among several diagnoses. For instance, in a study of women with breast cancer, 41% reported experiencing “intense fear, helplessness, or horror”; however, on further comprehensive diagnostic interview, only 4% met the full PTSD criteria. Assessment must be able to distinguish between general psychological distress and symptoms of PTSD.[5]

The accurate diagnosis of PTSD also requires the use of reliable and valid instruments. Many studies have used the PTSD module of the Structured Clinical Interview for DSM-III-R–Nonpatient Edition.[6] This instrument is a clinician-administered, structured clinical interview that is time intensive and may not be feasible in settings without adequately trained mental health professionals. However, one study [7] investigated the utility of a cost-effective screening tool, the PTSD Checklist-Civilian Version (PCL-C).[8] In this study of 82 women diagnosed with breast cancer assessed 6 to 72 months after cancer treatment, use of the PCL-C resulted in a sensitivity of 0.60 and specificity of 0.99. Other cutoff scores for the PCL-C that could be used were discussed, depending on the clinical resources available in specific cancer treatment settings. Most research studies have used the Impact of Event Scale, a self-report of intrusive thoughts;[9] however, it is important to note that this tool can help evaluate PTS symptoms but is not designed to assess PTSD.

### Comorbidity

In attempting to diagnose PTSD, it is important to be aware that this disorder is often marked by comorbid psychopathology. Substance abuse, affective disorders, and other anxiety disorders are consistently encountered in samples of people with PTSD.[3,10-12] For example, in one study, war veterans with PTSD exhibited substantial comorbid pathology that included:[13]

- Major depression (32% to 72%).
- Alcohol dependence (65%).
- Drug dependence (40%).
- Social phobia (50%).
- Obsessive-compulsive disorder (10%).

High rates of concurrent disorders have also been documented in other trauma victims. For example, 40% to 42% of disaster survivors with PTSD also qualified for a diagnosis of major depression, and 20% to 42% met the criteria for concurrent generalized anxiety disorder.[13,14] While co-occurring psychiatric disorders have not yet been studied in cancer patients or survivors, their presence in Vietnam War veterans and other trauma victims would indicate that cancer clinicians should be alert to identify and treat such related syndromes in their patients.

### The Conceptual Fit of PTS and Cancer

Conceptual and practical problems can arise in the application of PTS to cancer patients and survivors. The basic concept of an extreme traumatic stressor has been described variously as an event involving direct personal experience that involves actual or threatened death or serious injury.[15] This event can be protracted and continuous but is more frequently a single, time-limited event (e.g., rape, natural disaster). In this context, for the person who has been diagnosed with cancer, the exact nature of the trauma is unclear. Is it the actual diagnosis, aspects of the treatment process, information given about recurrence, test results, or some other aspect of the cancer experience? Identifying a discrete stressor within the multiple crises that constitute a cancer experience is more difficult than for other traumas. In one study of patients with breast cancer who underwent autologous bone marrow transplant, more PTSD-like symptoms were reported at the time of initial diagnosis.[16]

Another concern regarding conceptual fit is related to re-experiencing the trauma. In a study of women with early-stage breast cancer, researchers found that the traumatizing aspects of the cancer experience were receiving the diagnosis and waiting for test results from node dissection.[17] Arguing that these “information traumas” tend to cause intrusive worry about the future—not intrusive recollections of past events—the authors questioned whether cancer fits a conceptual model of PTSD trauma. Re-experiencing the trauma is often measured in terms of unwanted intrusive thoughts about the traumatic event. The cognitive processing of a current and ongoing health threat with uncertain outcome might differ significantly from unwanted intrusive thoughts about a single past event. Some researchers have argued that not all intrusive thoughts are negative or indicate re-experiencing a trauma; rather, they might represent appropriate vigilance and attention to potential symptoms that could result in appropriate help-seeking.[5,18]

Conversely, a unique study assessing the physiological reactivity of patients with breast cancer to a personalized imagery script of their most stressful experiences with cancer found elevated physiological responses that were comparable to those of PTSD patients who had experienced other (non–cancer-related) traumas. This finding suggests a good fit between patients with cancer and the PTSD trauma model, as it shows comparable symptoms of increased arousal in patients with cancer. Also, in a factor analytic study designed to confirm the presence of the three broad PTSD symptom clusters (re-experiencing, avoidance of reminders, and hyperarousal), researchers found some tentative support for the DSM-IV symptom clusters in a sample of breast cancer survivors.[19]

In a study of 74 women breast cancer survivors interviewed at 18 months postdiagnosis via the Structured Clinical Interview for DSM, three groups were identified: one met the full criteria for PTSD (n = 12), another met partial criteria for PTSD (i.e., subsyndromal, n = 15), and a third group had no PTSD (n = 47). Further analyses investigated group differences. Some notable factors affecting the full-criteria PTSD group compared with the subsyndromal and no-PTSD groups included the following:[20]

- Significantly higher number of violent traumas (e.g., physical abuse, rape).
- Higher number of anxiety disorders preceding a cancer diagnosis.
- More advanced disease (75% stage III vs. 7% in the subsyndromal group and 6% in the no-PTSD group).
- More extensive surgeries (83% modified radical mastectomy vs. 47% in the subsyndromal group and 38% in the no-PTSD group).
- Higher lifetime prevalence of previous PTSD (42% vs. 7% in the subsyndromal group and 9% in the no-PTSD group).

Further research is needed to continue to investigate the important question of how well the conceptual model of PTSD as an anxiety response to a major life trauma fits the life experience of patients with cancer. Reviews have argued both in favor of [21] and against [18] the continued use of trauma models for conceptualizing the experience of cancer. Others have proposed alternate conceptual models.[5,22]

### References

American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Greenberg DB, Goorin A, Gebhardt MC, et al.: Quality of life in osteosarcoma survivors. Oncology (Huntingt) 8 (11): 19-25; discussion 25-6, 32, 35, 1994.7826837 95127439
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-IV. 4th ed. American Psychiatric Association, 1994.
Perry S, Difede J, Musngi G, et al.: Predictors of posttraumatic stress disorder after burn injury. Am J Psychiatry 149 (7): 931-5, 1992.1609874 92303676
Deimling GT, Kahana B, Bowman KF, et al.: Cancer survivorship and psychological distress in later life. Psychooncology 11 (6): 479-94, 2002 Nov-Dec.12476430
Spitzer RL, Williams JB, Gibbon M, et al.: The Structured Clinical Interview for DSM-III-R (SCID). I: History, rationale, and description. Arch Gen Psychiatry 49 (8): 624-9, 1992.1637252 92344509
Andrykowski MA, Cordova MJ, Studts JL, et al.: Posttraumatic stress disorder after treatment for breast cancer: prevalence of diagnosis and use of the PTSD Checklist-Civilian Version (PCL-C) as a screening instrument. J Consult Clin Psychol 66 (3): 586-90, 1998.9642900
Weathers FW, Huska JA, Keane TM: PCL-C for DSM-IV. National Center for PTSD-Behavioral Science Division, 1991.
Sundin EC, Horowitz MJ: Impact of Event Scale: psychometric properties. Br J Psychiatry 180: 205-9, 2002.11872511
Rundell JR, Ursano RJ, Holloway HC, et al.: Psychiatric responses to trauma. Hosp Community Psychiatry 40 (1): 68-74, 1989.2643553 89108371
Davidson JR, Foa EB: Diagnostic issues in posttraumatic stress disorder: considerations for the DSM-IV. J Abnorm Psychol 100 (3): 346-55, 1991.1918613 92012538
Green BL, Lindy JD, Grace MC: Posttraumatic stress disorder. Toward DSM-IV. J Nerv Ment Dis 173 (7): 406-11, 1985.4009157 85236284
Keane TM, Wolfe J: Comorbidity in post-traumatic stress disorder: an analysis of community and clinical studies. J Appl Soc Psychol 20 (21): 1776-88, 1990.
Smith EM, North CS, McCool RE, et al.: Acute postdisaster psychiatric disorders: identification of persons at risk. Am J Psychiatry 147 (2): 202-6, 1990.2301660 90145249
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-IV-TR. 4th rev. ed. American Psychiatric Association, 2000.
Mundy EA, Blanchard EB, Cirenza E, et al.: Posttraumatic stress disorder in breast cancer patients following autologous bone marrow transplantation or conventional cancer treatments. Behav Res Ther 38 (10): 1015-27, 2000.11004740
Green BL, Rowland JH, Krupnick JL, et al.: Prevalence of posttraumatic stress disorder in women with breast cancer. Psychosomatics 39 (2): 102-11, 1998.9584535
Palmer SC, Kagee A, Coyne JC, et al.: Experience of trauma, distress, and posttraumatic stress disorder among breast cancer patients. Psychosom Med 66 (2): 258-64, 2004 Mar-Apr.15039512
Cordova MJ, Studts JL, Hann DM, et al.: Symptom structure of PTSD following breast cancer. J Trauma Stress 13 (2): 301-19, 2000.10838677
Shelby RA, Golden-Kreutz DM, Andersen BL: PTSD diagnoses, subsyndromal symptoms, and comorbidities contribute to impairments for breast cancer survivors. J Trauma Stress 21 (2): 165-72, 2008.18404636
Gurevich M, Devins GM, Rodin GM: Stress response syndromes and cancer: conceptual and assessment issues. Psychosomatics 43 (4): 259-81, 2002 Jul-Aug.12189252
Cordova MJ, Andrykowski MA: Responses to cancer diagnosis and treatment: posttraumatic stress and posttraumatic growth. Semin Clin Neuropsychiatry 8 (4): 286-96, 2003.14613054

## Treatment of Post-Traumatic Stress Disorder

The chronic and sometimes devastating psychological and interpersonal sequelae of post-traumatic stress disorder (PTSD) necessitates timely and effective treatment.[1,2] The avoidant responses associated with PTSD often delay or prevent individuals from seeking professional assistance. While no specific therapies for PTSD in the cancer setting have been developed, treatment modalities used with other people with PTSD can help alleviate distress in cancer patients and survivors.[3,4]

Most clinicians recommend using a multimodal approach, choosing components to meet the specific needs of each patient and taking into account any concurrent psychiatric disorders such as depression or substance abuse. Multiple modalities are frequently considered in a crisis intervention approach to facilitating adjustment of patients with cancer.

The crisis intervention model comprises a broad range of therapies that can help treat post-traumatic stress symptoms. The goals of this model are to reduce symptoms and restore patients to their usual levels of functioning. In this model, the therapist often takes an active, directive stance with the patient, focusing on the following: [5][Level of evidence: II]

- Resolving concrete problems.
- Teaching specific coping skills.
- Providing a safe and supportive environment.

Cognitive-behavioral techniques have proven especially helpful within the crisis intervention setting. Some of these methods include the following:[6]

- Helping the patient understand symptoms.
- Teaching effective coping strategies and stress management techniques (such as relaxation training).
- Restructuring cognition.
- Providing exposure to opportunities for systematic desensitization of symptoms.

In a single case study, a 10-session cognitive-behavioral intervention for a male cancer patient who was 3 years post–bone marrow transplant and had PTSD was found to be effective. This study used a combination of cognitive coping strategies, relaxation procedures, relapse prevention, and generalization techniques. Benefits were maintained at a 6-month follow-up.[7][Level of evidence: III] Behaviorally oriented approaches to sexual therapy may also be useful when the avoidance manifested by patients is decreased sexual activity and avoidance of intimate situations.

Support groups also appear to benefit people who experience post-traumatic symptoms. In the group setting, such patients can receive emotional support and encounter others with similar experiences and symptoms, validating their own experiences and learning a variety of coping and management strategies.

For patients with particularly distressing or severe symptoms, psychopharmacology may provide an additional means of treatment. Several classes of medications have been used to treat individuals with PTSD.[8,9] For pharmacological treatments for PTSD, see Table 1. For example:

- Tricyclic and monoamine oxidase-inhibitor antidepressants are commonly used, particularly when the symptoms of PTSD are accompanied by depression.
- Selective serotonin reuptake inhibitors are effective in reducing the hyperarousal and intrusive symptoms of PTSD.[1]
- Antianxiety medications may help reduce overall arousal and anxiety symptoms. Infrequently, antipsychotic medications may reduce severe intrusive flashbacks.

Table 1. Evidence Base for Pharmacological Treatments for PTSD in Patients Without Cancer^a,b^

Medication | Dosing (mg/day) | Target Symptoms^c^ | Evidence Basis
SSRIs^d^
Sertraline^e^ | 50–200 | All symptom clusters | Several RCTs
Paroxetine^e^ | 20–50 | All symptom clusters | Several RCTs
Fluoxetine | 20–60 | All symptom clusters | Several RCTs
Fluvoxamine | 50–300 | All symptom clusters | Open label
Citalopram | 20–60 | All symptom clusters | Open label
Escitalopram | 10–20 | All symptom clusters | Open label
Serotonin-Potentiating Non-SSRIs
Venlafaxine | 37.5–225 | All symptom clusters | Open label
Duloxetine | 30–120 | All symptom clusters | Open label
Trazodone | 50–300 | Insomnia, possibly other clusters | Open label
Mirtazapine | 15–45 | Insomnia, possibly other clusters | Open label
Other Antidepressants
Imipramine | 50–225 | Possibly all clusters | One RCT
Other Agents Used as Augmentation Therapy Only^f^
Atypical Antipsychotics
Risperidone | 1–6 | Clusters B and D, possibly cluster C | Several RCTs
Olanzapine | 5–20 | Possibly all clusters | One RCT
Quetiapine | 25–300 | Possibly all clusters | Open label
Anticonvulsants
Lamotrigine | 50–400 | Clusters B and C | One RCT
Adrenergic-Inhibiting Agents
Prazosin | 2–6 | All symptom clusters (primary target symptom: nightmares) | Several RCTs

RCT = randomized controlled trial; SSRIs = selective serotonin reuptake inhibitors.

^a^Adapted from Berger et al.[10] and Asnis et al.[11]

^b^All studies conducted in patients without cancer only. No studies have been reported on pharmacological treatments for PTSD conducted in patients with cancer.

^c^PTSD symptom clusters are as follows: cluster B, re-experiencing; cluster C, avoidance/numbing; cluster D, hyperarousal.

^d^Considered first-line treatments for PTSD.

^e^FDA approved for the treatment of PTSD.

^f^Used mainly as augmentation to SSRIs or serotonin-potentiating non-SSRIs.

### References

Davidson JR, Foa EB: Diagnostic issues in posttraumatic stress disorder: considerations for the DSM-IV. J Abnorm Psychol 100 (3): 346-55, 1991.1918613 92012538
Alter CL, Pelcovitz D, Axelrod A, et al.: Identification of PTSD in cancer survivors. Psychosomatics 37 (2): 137-43, 1996 Mar-Apr.8742542 96357807
Foa EB: Psychosocial treatment of posttraumatic stress disorder. J Clin Psychiatry 61 (Suppl 5): 43-8; discussion 49-51, 2000.10761678
Adshead G: Psychological therapies for post-traumatic stress disorder. Br J Psychiatry 177: 144-8, 2000.11026954
Perry S, Difede J, Musngi G, et al.: Predictors of posttraumatic stress disorder after burn injury. Am J Psychiatry 149 (7): 931-5, 1992.1609874 92303676
Mikulincer M, Solomon Z: Attributional style and combat-related posttraumatic stress disorder. J Abnorm Psychol 97 (3): 308-13, 1988.3192823 89054601
DuHamel KN, Ostroff JS, Bovbjerg DH, et al.: Trauma-focused intervention after bone marrow transplantation: A case study. Behav Ther 31 (1): 175-86, 2000.
Marmar CR, Neylan TC, Schoenfeld FB: New directions in the pharmacotherapy of posttraumatic stress disorder. Psychiatr Q 73 (4): 259-70, 2002 Winter.12418356
Davidson JR: Pharmacotherapy of posttraumatic stress disorder: treatment options, long-term follow-up, and predictors of outcome. J Clin Psychiatry 61 (Suppl 5): 52-6; discussion 57-9, 2000.10761679
Berger W, Mendlowicz MV, Marques-Portella C, et al.: Pharmacologic alternatives to antidepressants in posttraumatic stress disorder: a systematic review. Prog Neuropsychopharmacol Biol Psychiatry 33 (2): 169-80, 2009.19141307
Asnis GM, Kohn SR, Henderson M, et al.: SSRIs versus non-SSRIs in post-traumatic stress disorder: an update with recommendations. Drugs 64 (4): 383-404, 2004.14969574

## Considerations for Pediatric Patients and Their Families

Cancer is often a significant traumatic event, given the nature of the diagnosis, the number of invasive and painful procedures, and the often-long hospitalizations that children and their families must endure. Based on of this exposure model, a number of studies have examined whether children treated for cancer are at a significantly higher risk for developing symptoms of post-traumatic stress disorder (PTSD), with mixed results.[1] One study reported that children and adolescents who were undergoing treatment reported some symptoms of post-traumatic stress (PTS). However, for most children, these symptoms did not meet the criteria for a diagnosis of PTSD, and the symptoms diminished over time.[2][Level of evidence: II]

Other studies suggest that survivors of childhood cancer have an increased risk for PTS symptoms and PTSD after treatment is finished. In a study of 78 adults aged 18 to 41 years who had been treated for childhood cancer, 20.5% met the criteria for a diagnosis of PTSD at some time since the end of their treatment. Clinically significant events of intrusive symptoms (9%) and avoidant symptoms (16.7%) were reported in the sample, and the symptoms were associated with reports of elevated anxiety and other measures of psychological distress.[3][Level of evidence: II] Survivors who report higher levels of uncertainty about their disease and the future appear more likely to have reports of elevated PTS symptoms.[4][Level of evidence: II][5]

Similarly, a study of 182 adolescent and young adult cancer survivors who were more than 5 years from diagnosis and more than 2 years from completion of cancer treatment found that 16% met the criteria for PTSD. A relationship between PTSD and higher levels of other psychological problems was also reported.[6] When survivors met the criteria for PTSD, they were more likely to experience depression and negative affect, lower satisfaction with life, and poorer health-related quality of life, as well as difficulty performing developmental tasks.[7][Level of evidence: II]

### References

Bruce M: A systematic and conceptual review of posttraumatic stress in childhood cancer survivors and their parents. Clin Psychol Rev 26 (3): 233-56, 2006.16412542
Phipps S, Long A, Hudson M, et al.: Symptoms of post-traumatic stress in children with cancer and their parents: effects of informant and time from diagnosis. Pediatr Blood Cancer 45 (7): 952-9, 2005.15806541
Hobbie WL, Stuber M, Meeske K, et al.: Symptoms of posttraumatic stress in young adult survivors of childhood cancer. J Clin Oncol 18 (24): 4060-6, 2000.11118467 20569285
Lee YL: The relationships between uncertainty and posttraumatic stress in survivors of childhood cancer. J Nurs Res 14 (2): 133-42, 2006.16741863
Santacroce SJ, Lee YL: Uncertainty, posttraumatic stress, and health behavior in young adult childhood cancer survivors. Nurs Res 55 (4): 259-66, 2006 Jul-Aug.16849978
Rourke MT, Hobbie WL, Schwartz L, et al.: Posttraumatic stress disorder (PTSD) in young adult survivors of childhood cancer. Pediatr Blood Cancer 49 (2): 177-82, 2007.16862538
Schwartz L, Drotar D: Posttraumatic stress and related impairment in survivors of childhood cancer in early adulthood compared to healthy peers. J Pediatr Psychol 31 (4): 356-66, 2006.15788716

## Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (02/25/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the diagnostic criteria for and treatment of cancer-related post-traumatic stress and related symptoms. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Cancer-Related Post-Traumatic Stress are:

- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cancer-Related Post-Traumatic Stress. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/survivorship/new-normal/ptsd-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389172]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).